# Spirituality in Cancer Care (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about religious and spiritual coping in cancer care. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

National surveys consistently support the idea that religion and spirituality are important to most individuals in the general population. More than 90% of adults express a belief in God, and slightly more than 70% of individuals surveyed identified religion as one of the most important influences in their lives.[1] Yet even widely held beliefs, such as survival of the soul after death or a belief in miracles, vary substantially by gender, education, and ethnicity.[2]

Research indicates that both patients and family caregivers [3,4] commonly rely on spirituality and religion to help them deal with serious physical illnesses, with a desire to have specific spiritual and religious needs acknowledged or addressed by medical staff. These needs, although widespread, may take different forms between and within cultural and religious traditions.[5-7]

A survey of hospital inpatients found that 77% of them reported that physicians should take patients' spiritual needs into consideration, and 37% wanted physicians to address religious beliefs more frequently.[8] A large survey of cancer outpatients in New York City found that a slight majority felt it was appropriate for a physician to inquire about their religious beliefs and spiritual needs, although only 1% reported that this had occurred. Patients who reported that spiritual needs were not being met gave lower ratings to quality of care (P < .01) and reported lower satisfaction with care (P < .01).[7] A pilot study of 14 African American men with a history of prostate cancer found that most had discussed spirituality and religious beliefs with their physicians. They expressed a desire for their doctors and clergy to be in contact with each other.[9]

In addition, 61% of 57 inpatients with advanced cancer receiving end-of-life care in a hospital supported by the Catholic archdiocese reported spiritual distress when interviewed by hospital chaplains. The intensity of spiritual distress correlated with self-reports of depression but not with physical pain or perceived severity of illness.[10] Another study[11] of patients with advanced cancer (N = 230) in New England and Texas assessed spiritual needs. Almost half (47%) reported that their spiritual needs were not being met by a religious community, and 72% reported that these needs were not supported by the medical system. When such support existed, it was positively related to improved quality of life. Furthermore, having the medical care team address spiritual issues had more impact than did pastoral counseling on increasing hospice use and decreasing aggressive end-of-life measures.[12]

This summary will review the following topics:

- How religion and spirituality can be conceptualized within the medical setting.
- The empirical evidence for the importance of religious and spiritual factors in adjustment to illness in general and to cancer in particular, throughout the course of illness and at the end of life, for both patients and family caregivers.[3]
- The range of assessment approaches that may be useful in a clinical environment.
- Various models for management and intervention.
- Resources for clinical care.

Paying attention to the religious or spiritual beliefs of seriously ill patients has a long tradition within inpatient medical environments. Addressing such issues has been viewed as the domain of hospital chaplains or a patient’s own religious leader. In this context, systematic assessment has usually been limited to identifying a patient’s religious preference, while responsibility for management of apparent spiritual distress has fallen to the chaplain service.[13-15] Although health care providers may address such concerns themselves, they are generally very ambivalent about doing so,[16] and there has been relatively little systematic investigation addressing the physician’s role. These issues, however, are increasingly addressed in medical training.[17] Acknowledging the role of all health care professionals in spirituality, a multidisciplinary group from one cancer center developed a four-stage model that allows health care professionals to deliver spiritual care consistent with their knowledge, skills, and actions at one of four skill levels.[18]

Interest in and recognition of the function of religious and spiritual coping in adjustment to serious illness, including cancer, has been growing.[19-23] New ways to assess and address religious and spiritual concerns as part of overall quality of life are being developed and tested. Limited data support the possibility that spiritual coping is one of the most powerful means by which patients draw on their own resources to deal with a serious illness such as cancer. However, patients and their family caregivers may be reluctant to raise religious and spiritual concerns with their professional health care providers.[24-26] Increased spiritual well-being in a seriously ill population may be linked with lower anxiety about death,[27] but greater religious involvement may also be linked to an increased likelihood of desire for extreme measures at the end of life.[28] Given the importance of religion and spirituality to patients, integrating systematic assessment of such needs into medical care, including outpatient care, is crucial. The development of better assessment tools will make it easier to discern which aspects of religious and spiritual coping may be important in a particular patient’s adjustment to illness.

Of equal importance is the consideration of how and when to address religion and spirituality with patients and the best ways to do so in different medical environments.[29-31] Although addressing spiritual concerns is often considered an end-of-life issue, such concerns may arise at any time after diagnosis.[24] Acknowledging the importance of these concerns and addressing them, even briefly, at diagnosis may facilitate better adjustment throughout the course of treatment and create a context for richer dialogue later in the illness. One study of 118 patients seen in follow-up by one of four oncologists suggests that a semistructured inquiry into spiritual concerns related to coping with cancer is well accepted by patients and oncologists and is associated with positive perceptions of care and well-being.[32]

In this summary, unless otherwise stated, evidence and practice issues as they relate to adults are discussed. The evidence and application to practice related to children may differ significantly from information related to adults. When specific information about the care of children is available, it is summarized under its own heading.

### References

Gallup GH Jr: Religion In America 1996: Will the Vitality of the Church Be the Surprise of the 21st Century? Princeton Religion Research Center, 1996.
Taylor H: The Religious and Other Beliefs of Americans 2003. The Harris Poll #11, February 26, 2003. Rochester, NY: Harris Interactive Inc., 2003.
Kim Y, Wellisch DK, Spillers RL, et al.: Psychological distress of female cancer caregivers: effects of type of cancer and caregivers' spirituality. Support Care Cancer 15 (12): 1367-74, 2007.17516094
Whitford HS, Olver IN, Peterson MJ: Spirituality as a core domain in the assessment of quality of life in oncology. Psychooncology 17 (11): 1121-8, 2008.18322902
Taleghani F, Yekta ZP, Nasrabadi AN: Coping with breast cancer in newly diagnosed Iranian women. J Adv Nurs 54 (3): 265-72; discussion 272-3, 2006.16629910
Blocker DE, Romocki LS, Thomas KB, et al.: Knowledge, beliefs and barriers associated with prostate cancer prevention and screening behaviors among African-American men. J Natl Med Assoc 98 (8): 1286-95, 2006.16916126
Astrow AB, Wexler A, Texeira K, et al.: Is failure to meet spiritual needs associated with cancer patients' perceptions of quality of care and their satisfaction with care? J Clin Oncol 25 (36): 5753-7, 2007.18089871
King DE, Bushwick B: Beliefs and attitudes of hospital inpatients about faith healing and prayer. J Fam Pract 39 (4): 349-52, 1994.7931113 95016475
Bowie J, Sydnor KD, Granot M: Spirituality and care of prostate cancer patients: a pilot study. J Natl Med Assoc 95 (10): 951-4, 2003.14620707
Mako C, Galek K, Poppito SR: Spiritual pain among patients with advanced cancer in palliative care. J Palliat Med 9 (5): 1106-13, 2006.17040148
Balboni TA, Vanderwerker LC, Block SD, et al.: Religiousness and spiritual support among advanced cancer patients and associations with end-of-life treatment preferences and quality of life. J Clin Oncol 25 (5): 555-60, 2007.17290065
Balboni TA, Paulk ME, Balboni MJ, et al.: Provision of spiritual care to patients with advanced cancer: associations with medical care and quality of life near death. J Clin Oncol 28 (3): 445-52, 2010.20008625
Zabora J, Blanchard CG, Smith ED, et al.: Prevalence of psychological distress among cancer patients across the disease continuum. Journal of Psychosocial Oncology 15 (2): 73-87, 1997.
Fitchett G, Meyer PM, Burton LA: Spiritual care in the hospital: who requests it? Who needs it? J Pastoral Care 54 (2): 173-86, 2000 Summer.11067526 20447969
Handzo G: Where do chaplains fit in the world of cancer care? J Health Care Chaplain 4 (1-2): 29-44, 1992.10124193 93180056
Kristeller JL, Zumbrun CS, Schilling RF: 'I would if I could': how oncologists and oncology nurses address spiritual distress in cancer patients. Psychooncology 8 (5): 451-8, 1999 Sep-Oct.10559804 20027890
Puchalski C, Romer AL: Taking a spiritual history allows clinicians to understand patients more fully. J Palliat Med 3(1): 129-137, 2000.
Gordon T, Mitchell D: A competency model for the assessment and delivery of spiritual care. Palliat Med 18 (7): 646-51, 2004.15540674
Pargament KI: The Psychology of Religion and Coping: Theory, Research, Practice. Guilford Press, 1997.
Koenig HG: Spirituality in Patient Care: Why, How, When, and What. Templeton Foundation Press, 2002.
Koenig HG, McCullough ME, Larson DB: Handbook of Religion and Health. Oxford University Press, 2001.
Tarakeshwar N, Vanderwerker LC, Paulk E, et al.: Religious coping is associated with the quality of life of patients with advanced cancer. J Palliat Med 9 (3): 646-57, 2006.16752970
Yanez B, Edmondson D, Stanton AL, et al.: Facets of spirituality as predictors of adjustment to cancer: relative contributions of having faith and finding meaning. J Consult Clin Psychol 77 (4): 730-41, 2009.19634965
Murray SA, Kendall M, Boyd K, et al.: Exploring the spiritual needs of people dying of lung cancer or heart failure: a prospective qualitative interview study of patients and their carers. Palliat Med 18 (1): 39-45, 2004.14982206
McCullough ME, Hoyt WT, Larson DB, et al.: Religious involvement and mortality: a meta-analytic review. Health Psychol 19 (3): 211-22, 2000.10868765 20324617
Jenkins RA, Pargament KI: Religion and spirituality as resources for coping with cancer. Journal of Psychosocial Oncology 13 (1/2): 51-74, 1995.
Chibnall JT, Videen SD, Duckro PN, et al.: Psychosocial-spiritual correlates of death distress in patients with life-threatening medical conditions. Palliat Med 16 (4): 331-8, 2002.12132546 22127571
Phelps AC, Maciejewski PK, Nilsson M, et al.: Religious coping and use of intensive life-prolonging care near death in patients with advanced cancer. JAMA 301 (11): 1140-7, 2009.19293414
Post SG, Puchalski CM, Larson DB: Physicians and patient spirituality: professional boundaries, competency, and ethics. Ann Intern Med 132 (7): 578-83, 2000.10744595 20186682
Sloan RP, Bagiella E, VandeCreek L, et al.: Should physicians prescribe religious activities? N Engl J Med 342 (25): 1913-6, 2000.10861331 20302427
Dagi TF: Prayer, piety and professional propriety: limits on religious expression in hospitals. J Clin Ethics 6 (3): 274-9, 1995 Fall.8605393 96188184
Kristeller JL, Rhodes M, Cripe LD, et al.: Oncologist Assisted Spiritual Intervention Study (OASIS): patient acceptability and initial evidence of effects. Int J Psychiatry Med 35 (4): 329-47, 2005.16673834

## Definitions

Specific religious beliefs and practices should be distinguished from the idea of a universal capacity for spiritual and religious experiences. Although this distinction may not be salient or important on a personal basis, it is important conceptually for understanding various aspects of evaluation and the role of different beliefs, practices, and experiences in coping with cancer.

The most useful general distinction in this context is between religion and spirituality. There is no general agreement on definitions of either term, but there is general agreement on the usefulness of this distinction.[1-3]

- Religion can be viewed as a specific set of beliefs and practices associated with a recognized religion or denomination.
- Spirituality is generally recognized as encompassing experiential aspects, whether related to engaging in religious practices or acknowledging a general sense of peace and connectedness. Found in all cultures, the concept of spirituality is often considered to encompass a search for ultimate meaning through religion or other paths.[4]

In health care, concerns about spiritual or religious well-being have sometimes been viewed as an aspect of complementary and alternative medicine (CAM), but this perception may be more characteristic of providers than of patients. In one study,[5] virtually no patients but about 20% of providers said that CAM services were sought to assist with spiritual or religious issues.

Religion is highly culturally determined. Spirituality is considered a universal human capacity, usually—but not necessarily—associated with and expressed in religious practice. Most individuals consider themselves both spiritual and religious. Some may consider themselves religious but not spiritual; others, including some atheists (people who do not believe in the existence of God) or agnostics (people who believe that God cannot be shown to exist), may consider themselves spiritual but not religious. In a sample of 369 representative cancer outpatients in New York City (33% minority groups), 6% identified themselves as agnostic or atheist, 29% attended religious services weekly; and 66% represented themselves as spiritual but not religious.[6]

One effort to characterize individuals by types of spiritual and religious experience [7] identified the following three groups, using cluster analytic techniques:

1. Religious individuals who highly value religious faith, spiritual well-being, and the meaning of life.
2. Existential individuals who highly value spiritual well-being but not religious faith.
3. Nonspiritual individuals who have little value for religiousness, spirituality, or a sense of the meaning of life.

Individuals in the third group were far more distressed about their illness and experienced worse adjustment than the other two groups. There is not yet consensus on the number or types of underlying dimensions of spirituality or religious engagement.

From the perspective of both the research and clinical literature on the relationships among religion, spirituality, and health, it is important to consider how investigators and authors define and use these concepts. Much of the epidemiological literature that indicates a relationship between religion and health is based on definitions of religious involvement such as:

- Membership in a religious group.
- Frequency of attendance at religious services.

Assessing specific beliefs or religious practices such as belief in God, frequency of prayer, or reading religious material is somewhat more complex. Individuals may engage in such practices or believe in God without necessarily attending services. Terminology also carries certain connotations. The term religiosity, for example, has a history of implying fervor and perhaps undue investment in particular religious practices or beliefs. The term religiousness may be a more neutral way to refer to the dimension of religious practice.

Spirituality and spiritual well-being are more challenging to define. Some definitions limit spirituality to mean profound mystical experiences. However, in effects on health and psychological well-being, the more helpful definitions focus on accessible feelings, such as:

- A sense of inner peace.
- Existential meaning.
- Awe when walking in nature.

This discussion assumes a continuum of meaningful spiritual experiences, from the common and accessible to the extraordinary and transformative. Both type and intensity of experience may vary. Other aspects of spirituality that have been identified by those working with patients include the following:

- A sense of meaning and peace.
- A sense of faith.
- A sense of connectedness to others or to God.

Low levels of these experiences may be associated with poorer coping.[3] For more information, see the Religion, Spirituality, and Living With Cancer section.

The definition of acute spiritual distress must be considered separately. Spiritual distress may result from the belief that cancer reflects punishment by God or may accompany a preoccupation with the question “Why me?” A cancer patient may also suffer a loss of faith.[8] Although many individuals may have such thoughts at some point after diagnosis, only a few become obsessed with these thoughts or score high on a general measure of religious and spiritual distress (such as the Negative subscale of the Religious Coping Scale).[8] High levels of spiritual distress may contribute to poorer health and psychosocial outcomes.[9,10] The tools for measuring these dimensions are described in the Screening and Assessment of Spiritual Concerns section.

### References

Halstead MT, Mickley JR: Attempting to fathom the unfathomable: descriptive views of spirituality. Semin Oncol Nurs 13 (4): 225-30, 1997.9392027 98053515
Zinnbauer BJ, Pargament KL: Spiritual conversion: a study of religious change among college students. J Sci Study Relig 37 (1): 161-80, 1998.
Breitbart W, Gibson C, Poppito SR, et al.: Psychotherapeutic interventions at the end of life: a focus on meaning and spirituality. Can J Psychiatry 49 (6): 366-72, 2004.15283531
Task force report: spirituality, cultural issues, and end of life care. In: Association of American Medical Colleges: Report III. Contemporary Issues in Medicine: Communication in Medicine. Association of American Medical Colleges, 1999, pp 24-9.
Ben-Arye E, Bar-Sela G, Frenkel M, et al.: Is a biopsychosocial-spiritual approach relevant to cancer treatment? A study of patients and oncology staff members on issues of complementary medicine and spirituality. Support Care Cancer 14 (2): 147-52, 2006.16133071
Astrow AB, Wexler A, Texeira K, et al.: Is failure to meet spiritual needs associated with cancer patients' perceptions of quality of care and their satisfaction with care? J Clin Oncol 25 (36): 5753-7, 2007.18089871
Riley BB, Perna R, Tate DG, et al.: Types of spiritual well-being among persons with chronic illness: their relation to various forms of quality of life. Arch Phys Med Rehabil 79 (3): 258-64, 1998.9523776 98181950
Pargament KI: The Psychology of Religion and Coping: Theory, Research, Practice. Guilford Press, 1997.
Pargament KI, Koenig HG, Tarakeshwar N, et al.: Religious struggle as a predictor of mortality among medically ill elderly patients: a 2-year longitudinal study. Arch Intern Med 161 (15): 1881-5, 2001 Aug 13-27.11493130 21384574
Hills J, Paice JA, Cameron JR, et al.: Spirituality and distress in palliative care consultation. J Palliat Med 8 (4): 782-8, 2005.16128652

## Religion, Spirituality, and Living With Cancer

Religion and spirituality have been shown to be significantly associated with measures of adjustment to cancer and with management of cancer symptoms in patients. Religious and spiritual coping have been associated with lower levels of patient discomfort as well as reduced hostility, anxiety, and social isolation in patients with cancer [1-4] and family caregivers.[5] Specific characteristics of strong religious beliefs, including hope, optimism, freedom from regret, and life satisfaction, have also been associated with improved adjustment in individuals diagnosed with cancer.[6,7]

Type of religious coping may influence quality of life. In a multi-institutional cross-sectional study of 170 patients with advanced cancer, more use of positive religious coping methods (such as benevolent religious appraisals) was associated with better overall quality of life and higher scores on the existential and support domains of the McGill Quality of Life Questionnaire. In contrast, more use of negative religious coping methods (such as anger at God) was related to poorer overall quality of life and lower scores on the existential and psychological domains.[8,9] A study of 95 patients with cancer diagnosed within the past 5 years found that spirituality was associated with less distress and better quality of life regardless of perceived life threat, with existential well-being but not religious well-being as the major contributor.[10]

Spiritual well-being, particularly a sense of meaning and peace,[11] is significantly associated with an ability of cancer patients to continue to enjoy life despite high levels of pain or fatigue. Spiritual well-being and depression are inversely related.[12,13] Higher levels of a sense of inner meaning and peace have also been associated with lower levels of depression, whereas measures of religiousness were unrelated to depression.[14]

This relationship has been specifically demonstrated in the cancer setting. In a cross-sectional survey of 85 hospice patients with cancer, there was a negative correlation between anxiety and depression (as measured by the Hospital Anxiety and Depression Scale) and overall spiritual well-being (as measured by the Spiritual Well-Being Scale) (P < .0001). There was also a negative correlation between the existential well-being scores and the anxiety and depression scores but not with the religious well-being score (P < .001).[15] These patterns were also found in a large study of indigent survivors of prostate cancer; the patterns were consistent across ethnicity and metastatic status.[16]

In a large (N = 418) study of breast cancer patients, a higher level of meaning and peace was associated with a decline in depression over 12 months, whereas higher religiousness predicted an increase in depression, particularly if the sense of meaning/peace was lower.[17][Level of evidence: II] A second study with mixed gender/mixed cancer survivors (N = 165) found similar patterns. In both studies, high levels of religiousness were linked to increases in perceived cancer-related growth.[17][Level of evidence: II] In a convenience sample, 222 low-income men with prostate cancer were surveyed about spirituality and health-related quality of life. Low scores in spirituality, as measured by the peace/meaning and faith subscale of the Functional Assessment of Chronic Illness Therapy—Spiritual Well-Being (FACIT-Sp), were associated with significantly worse physical and mental health than were high scores in spirituality.[18]

A large national survey of 361 paired U.S. survivors (52% women) and caregivers (including spouses and adult children) found that for both survivors and caregivers, the peace factor of the FACIT-Sp was strongly related to mental health but negligibly or not at all related to physical well-being. The faith factor (“religiousness”) was unrelated to physical or mental well-being.[19] These findings support the value of the FACIT-Sp in separating people’s religious involvement from their sense of spiritual well-being and that it is this sense of spiritual well-being that seems to be most related to psychological adjustment.

Another large national survey study of female family caregivers (N = 252; 89% White) found that higher levels of spirituality, as measured by the FACIT-Sp, were associated with much less psychological distress (measured by the Pearlin Stress Scale). Participants with higher levels of spirituality actually had improved well-being even as the stress caused by caregiving increased, while those with lower levels of spirituality showed the opposite pattern. This finding suggests a strong stress-buffering effect of spiritual well-being and reinforces the need to identify low spiritual well-being when assessing the coping capacity of family caregivers as well as patients.[5]

Data from the National Quality of Life Survey for Caregivers were used to examine the effects of spirituality on caregiving motivation and satisfaction. Caregivers received a baseline survey to measure motivation 2 years after a family member’s cancer diagnosis and again at 5 years after diagnosis. Male caregivers were more likely to report internal/spiritual motives for caregiving, whereas the motives of female caregivers were not related to internal/spiritual reasons. However, both men and women who were able to identify a sense of spiritual peace in their caregiving efforts had better mental health after 5 years of caregiving. Evidence suggests that caregiver motivation affects long-term mental health and quality of life.[20][Level of evidence: II]

One author [21] found that cancer survivors who had drawn on spiritual resources reported substantial personal growth as a function of dealing with the trauma of cancer. This finding was echoed in a survey study of 100 well-educated, mostly married/partnered White women with early-stage breast cancer, recruited from an Internet website. The study found that increasing levels of spiritual struggle were related to poorer emotional adjustment, though not to other aspects of cancer-related quality of life.[22] Using path analytic techniques, a study of women with breast cancer found that at both prediagnosis and 6 months postsurgery, holding negative images of God was the strongest predictor of emotional distress and lower social well-being.[23] However, longitudinal analyses failed to find sustained effects for baseline positive or negative attitudes toward God at either 6 or 12 months. One possible explanation for these findings is that such attitudes are somewhat unstable during a period of uncertainty (e.g., at prediagnosis).[23]

Engaging in prayer is often cited as an adaptive tool,[24] but qualitative research [25] found that for about one-third of cancer patients interviewed, concerns about how to pray effectively or the questions raised about the effectiveness of prayer also caused inner conflict and mild distress. In another study, of 123 patients hospitalized on a palliative care unit, 26.8% reported having used spiritual healing and prayer for curative purposes, 35% for improving survival, and 36.6% for improving symptoms (note: these percentages overlap). Higher levels of faith on the FACIT-Sp were associated with greater use of complementary and alternative medicine techniques in general and with interest in future use, whereas the level of meaning/peace was not. The study also looked at the general use of complementary therapies.[26] A useful discussion of how patients with cancer use prayer and how clinicians might conceptualize prayer has been published.[27]

Ethnicity and spirituality were investigated in a qualitative study of 161 breast cancer survivors.[28] In individual interviews, most participants (83%) spoke about some aspect of their spirituality. A higher percentage of African American, Latina, and Christian participants felt comforted by God than did those in other groups. Seven themes were identified:

- God as a comforting presence.
- Questioning faith.
- Anger at God.
- Spiritual transformation of self and attitude toward others/recognition of own mortality.
- Deepening of faith.
- Acceptance.
- Prayer by self.

One meta-analysis showed that positive religious involvement and spirituality appeared to be associated with better health and longer life expectancy, even after researchers controlled for other variables, such as health behaviors and social support.[29] Although little of this research is specific to cancer patients, one study of 230 patients with advanced cancer (expected prognosis <1 year) investigated a variety of associations between religiousness and spiritual support.[30] Most study participants (88%) considered religion either very important (68%) or somewhat important (20%), and more African American and Hispanic individuals than White individuals reported religion to be very important. Spiritual support by religious communities or the medical system was associated with better patient quality of life. Age was not associated with religiousness. At the time of recruitment, increasing self-reported distress was associated with increasing religiousness, and private religious or spiritual activities were performed by a larger percentage of patients after their diagnosis (61%) than before (47%). Regarding spiritual support, 38% reported that their spiritual needs were supported by a religious community “to a large extent or completely,” while 47% reported receiving support from a religious community “to a small extent or not at all.” Finally, religiousness was also associated with preference of “wanting all measures taken to extend life” at the end of life.

Another study [31] found that helper and cytotoxic T-cell counts were higher among women with metastatic breast cancer who reported greater importance of spirituality. Other investigators [32] found that attendance at religious services was associated with better immune system functioning. Still other research [33,34] suggests that religious distress negatively affects health status. These associations, however, have been criticized as weak and inconsistent.[35]

Several randomized trials with cancer patients have suggested that group support interventions benefit survival.[36,37] These studies must be interpreted cautiously, however. First, the treatments focused on general psychotherapeutic issues and psychosocial support. Although spiritually relevant issues undoubtedly arose in these settings, they were not the focus of the groups. Second, there has been difficulty replicating these effects.[38]

### References

Acklin MW, Brown EC, Mauger PA: The role of religious values in coping with cancer. J Relig Health 22 (4): 322-333, 1983.
Kaczorowski JM: Spiritual well-being and anxiety in adults diagnosed with cancer. Hosp J 5 (3-4): 105-16, 1989.2628250 90185596
McCullough ME, Hoyt WT, Larson DB, et al.: Religious involvement and mortality: a meta-analytic review. Health Psychol 19 (3): 211-22, 2000.10868765 20324617
Janiszewska J, Buss T, de Walden-Gałuszko K, et al.: The religiousness as a way of coping with anxiety in women with breast cancer at different disease stages. Support Care Cancer 16 (12): 1361-6, 2008.18386074
Kim Y, Wellisch DK, Spillers RL, et al.: Psychological distress of female cancer caregivers: effects of type of cancer and caregivers' spirituality. Support Care Cancer 15 (12): 1367-74, 2007.17516094
Weisman AD, Worden JW: The existential plight in cancer: significance of the first 100 days. Int J Psychiatry Med 7 (1): 1-15, 1976-77.1052080 77005419
Pargament KI: The Psychology of Religion and Coping: Theory, Research, Practice. Guilford Press, 1997.
Tarakeshwar N, Vanderwerker LC, Paulk E, et al.: Religious coping is associated with the quality of life of patients with advanced cancer. J Palliat Med 9 (3): 646-57, 2006.16752970
Hills J, Paice JA, Cameron JR, et al.: Spirituality and distress in palliative care consultation. J Palliat Med 8 (4): 782-8, 2005.16128652
Laubmeier KK, Zakowski SG, Bair JP: The role of spirituality in the psychological adjustment to cancer: a test of the transactional model of stress and coping. Int J Behav Med 11 (1): 48-55, 2004.15194519
Brady MJ, Peterman AH, Fitchett G, et al.: A case for including spirituality in quality of life measurement in oncology. Psychooncology 8 (5): 417-28, 1999 Sep-Oct.10559801 20027887
O'Mahony S, Goulet J, Kornblith A, et al.: Desire for hastened death, cancer pain and depression: report of a longitudinal observational study. J Pain Symptom Manage 29 (5): 446-57, 2005.15904747
Whitford HS, Olver IN, Peterson MJ: Spirituality as a core domain in the assessment of quality of life in oncology. Psychooncology 17 (11): 1121-8, 2008.18322902
Nelson CJ, Rosenfeld B, Breitbart W, et al.: Spirituality, religion, and depression in the terminally ill. Psychosomatics 43 (3): 213-20, 2002 May-Jun.12075036 22070552
McCoubrie RC, Davies AN: Is there a correlation between spirituality and anxiety and depression in patients with advanced cancer? Support Care Cancer 14 (4): 379-85, 2006.16283208
Krupski TL, Kwan L, Afifi AA, et al.: Geographic and socioeconomic variation in the treatment of prostate cancer. J Clin Oncol 23 (31): 7881-8, 2005.16204005
Yanez B, Edmondson D, Stanton AL, et al.: Facets of spirituality as predictors of adjustment to cancer: relative contributions of having faith and finding meaning. J Consult Clin Psychol 77 (4): 730-41, 2009.19634965
Krupski TL, Kwan L, Fink A, et al.: Spirituality influences health related quality of life in men with prostate cancer. Psychooncology 15 (2): 121-31, 2006.15880458
Kim Y, Carver CS, Spillers RL, et al.: Individual and dyadic relations between spiritual well-being and quality of life among cancer survivors and their spousal caregivers. Psychooncology 20 (7): 762-70, 2011.20878868
Kim Y, Carver CS, Cannady RS: Caregiving Motivation Predicts Long-Term Spirituality and Quality of Life of the Caregivers. Ann Behav Med 49 (4): 500-9, 2015.25637107
Carpenter JS, Brockopp DY, Andrykowski MA: Self-transformation as a factor in the self-esteem and well-being of breast cancer survivors. J Adv Nurs 29 (6): 1402-11, 1999.10354235 99282564
Manning-Walsh J: Spiritual struggle: effect on quality of life and life satisfaction in women with breast cancer. J Holist Nurs 23 (2): 120-40; discussion 141-4, 2005.15883461
Gall TL, Kristjansson E, Charbonneau C, et al.: A longitudinal study on the role of spirituality in response to the diagnosis and treatment of breast cancer. J Behav Med 32 (2): 174-86, 2009.18982441
Halstead MT, Fernsler JI: Coping strategies of long-term cancer survivors. Cancer Nurs 17 (2): 94-100, 1994.8020003 94291092
Taylor EJ, Outlaw FH, Bernardo TR, et al.: Spiritual conflicts associated with praying about cancer. Psychooncology 8 (5): 386-94, 1999 Sep-Oct.10559798 20027884
Trinkaus M, Burman D, Barmala N, et al.: Spirituality and use of complementary therapies for cure in advanced cancer. Psychooncology 20 (7): 746-54, 2011.20878865
Taylor EJ, Outlaw FH: Use of prayer among persons with cancer. Holist Nurs Pract 16 (3): 46-60, 2002.11913227 21911345
Levine EG, Yoo G, Aviv C, et al.: Ethnicity and spirituality in breast cancer survivors. J Cancer Surviv 1 (3): 212-25, 2007.18648972
Mueller PS, Plevak DJ, Rummans TA: Religious involvement, spirituality, and medicine: implications for clinical practice. Mayo Clin Proc 76 (12): 1225-35, 2001.11761504 21597040
Balboni TA, Vanderwerker LC, Block SD, et al.: Religiousness and spiritual support among advanced cancer patients and associations with end-of-life treatment preferences and quality of life. J Clin Oncol 25 (5): 555-60, 2007.17290065
Sephton SE, Koopman C, Schaal M, et al.: Spiritual expression and immune status in women with metastatic breast cancer: an exploratory study. Breast J 7 (5): 345-53, 2001 Sep-Oct.11906445 21903924
Koenig HG, Cohen HJ, George LK, et al.: Attendance at religious services, interleukin-6, and other biological parameters of immune function in older adults. Int J Psychiatry Med 27 (3): 233-50, 1997.9565726 98226847
Koenig HG, Pargament KI, Nielsen J: Religious coping and health status in medically ill hospitalized older adults. J Nerv Ment Dis 186 (9): 513-21, 1998.9741556 98412587
Pargament KI, Koenig HG, Tarakeshwar N, et al.: Religious struggle as a predictor of mortality among medically ill elderly patients: a 2-year longitudinal study. Arch Intern Med 161 (15): 1881-5, 2001 Aug 13-27.11493130 21384574
Sloan RP, Bagiella E: Claims about religious involvement and health outcomes. Ann Behav Med 24 (1): 14-21, 2002 Winter.12008790 22002450
Spiegel D, Bloom JR, Kraemer H, et al.: Psychological support for cancer patients. Lancet 2 (8677): 1447, 1989.2574371 90081157
Fawzy FI, Fawzy NW, Hyun CS, et al.: Malignant melanoma. Effects of an early structured psychiatric intervention, coping, and affective state on recurrence and survival 6 years later. Arch Gen Psychiatry 50 (9): 681-9, 1993.8357293 93363040
Cunningham AJ, Edmonds CV, Jenkins GP, et al.: A randomized controlled trial of the effects of group psychological therapy on survival in women with metastatic breast cancer. Psychooncology 7 (6): 508-17, 1998 Nov-Dec.9885092 99100830

## Screening and Assessment of Spiritual Concerns

Raising spiritual concerns with patients can be accomplished by the following approaches:[1,2]

- Wait for the patient to bring up spiritual concerns.
- Request that the patient complete a paper-and-pencil assessment.
- Have the physician do a spiritual inquiry or assessment by indicating his or her openness to a discussion.

These approaches have different potential value and limitations. Patients may be reluctant to bring up spiritual issues and prefer to wait for the provider to broach the subject. Standardized assessment tools vary, have generally been designed for research purposes, and need to be reviewed and utilized appropriately by the provider. Physicians, unless trained specifically to address such issues, may feel uncomfortable raising spiritual concerns with patients.[3] However, an increasing number of models are available for physician use and training.[4]

Table 1 summarizes a selection of tools to assess religion and spirituality. Several factors should be considered before choosing an assessment tool:

- Focus of the evaluation (religious practice or spiritual well-being/distress).
- Purpose of the assessment (e.g., screening for distress vs. evaluation of all patients as part of care).
- Modality of the assessment (interview or questionnaire).
- Feasibility of the assessment (staff and patient burden).

The line between assessment and intervention is blurred, and simply inquiring about an area such as religious or spiritual coping may prompt the patient's desire to further explore and validate this experience. Evidence suggests that only a small proportion of patients view such an inquiry as intrusive and distressing. Key assessment approaches are briefly reviewed below; pertinent characteristics are summarized in Table 1.

### Standardized Assessment Measures

One of several paper-and-pencil measures can be given to patients to assess religious and spiritual needs. These measures have the advantage of being self-administered; however, they were mostly designed as research tools, and their role for clinical assessment purposes is not as well understood. These measures may be helpful in opening up the topic for exploration and for ascertaining basic levels of religious engagement or spiritual well-being (or spiritual distress). Most tools assume a belief in God and may seem inappropriate for an atheist or agnostic patient, who may still be spiritually oriented. All of the measures have undergone varying degrees of psychometric development, and most are being used in investigations of the relationship between religion or spirituality, health indices, and adjustment to illness.

- Duke Religious Index (DRI): The DRI (or DUREL) [5][Level of evidence: II][6] is short (five items) and has reasonable psychometric properties [5] examined in patients with cancer. It is best used as an indicator of religious involvement rather than spirituality and has low or modest correlations with psychological well-being.
- Systems of Belief Inventory (SBI-15R): The SBI-15R [7][Level of evidence: II] has undergone careful psychometric development and measures two domains:
  1. Presence and importance of religious and spiritual beliefs and practices.
  2. Value of support from a religious/spiritual community.
  The questions are worded well and may provide a good initiation for further discussion and exploration.
- Brief Measure of Religious Coping (RCOPE): The Brief RCOPE [8][Level of evidence: II] has two dimensions: positive religious coping and negative religious coping, with five items each. The second factor appears to uniquely identify an important aspect of spiritual adjustment, i.e., the degree to which conflict, self-blame, or anger at God is present for an individual. A longer form of the scale, with additional dimensions, would be suitable for a more comprehensive assessment of religious/spiritual concerns. Psychometric development is high. While high scores in negative religious coping are unusual, they are particularly powerful in predicting poor adjustment to disease.[9]
- Functional Assessment of Chronic Illness Therapy—Spiritual Well-Being (FACIT-Sp):[10] The FACIT-Sp is part of the widely used Functional Assessment of Cancer Therapy quality-of-life battery.[11] Developed with an ethnically diverse cancer population, it contains 12 items and 2 factors (faith, and meaning and peace), with good to excellent psychometric properties. Although some evidence suggests that inner meaning and inner peace can be identified as two separate factors, such identification does not appear to substantially improve associations with other indicators of well-being.[12] One characteristic of this scale is that the wording of items does not assume a belief in God. Therefore, it can be comfortably completed by an atheist or agnostic, yet it taps into both traditional religiousness dimensions (faith factor) and spiritual dimensions (meaning and peace factor).
  The meaning and peace factor has been shown to have particularly strong associations with psychological adjustment, in that individuals who score high on this scale are much more likely to report enjoying life despite fatigue or pain, are less likely to desire a hastened death at the end of life,[13][Level of evidence: II] report better disease-specific and psychosocial adjustment,[14-16] and report lower levels of helplessness/hopelessness.[16] These associations have been shown to be independent of other indicators of adjustment, supporting the value of adding religious and spiritual assessment to standard quality-of-life evaluations.[10,16] Total scores on the FACIT-Sp correlated highly over time (27 weeks) with a 10-point linear analogue scale of spiritual well-being in a sample of patients with advanced cancer. The linear scale (Spiritual Well-Being Linear Analogue Self-Assessment ) was worded, “How would you describe your overall spiritual well-being?” Ratings ranged from 0 (as bad as it can be) to 10 (as good as it can be).[17]
- Spiritual Transformation Scale (STS):[18] The STS is a 40-item measure of change in spiritual engagement after a cancer diagnosis. It has two subscales:
  1. Spiritual Growth (SG): The SG factor is highly correlated with the Positive subscale of the Religious Coping Scale (the RCOPE–Positive) (r = .71) and the Post-traumatic Growth Inventory (r = .68).
  2. Spiritual Decline (SD): The SD factor is correlated with the Negative subscale of the Religious Coping Scale (the RCOPE–Negative) (r = .56) and the Center for Epidemiologic Studies Depression Scale (CES-D) (r = .40).
  Analyses show that the STS accounts for additional variance on depression, other measures of adjustment (Positive and Negative Affect Schedule), and the Daily Spiritual Experience Scale.[18] Individuals with stage III or IV cancer had higher SG scores, as did individuals with a recurrence rather than a new diagnosis. Individuals with higher SD scores were more likely to have not graduated from high school. A unique strength of this scale is that it is specific to change in spirituality since diagnosis; the wording of items is also generally appropriate for individuals who identify as spiritual rather than religious. Among the limitations is that development to date includes mostly observant Christians, with few minority individuals in the sample.

### Interviewing Tools

The following semistructured interviewing tools are designed to facilitate an exploration of religious beliefs and spiritual experiences or issues by the physician or other health care provider. The tools take the spiritual history approach and have the advantage of engaging the patient in dialogue, identifying possible areas of concern, and indicating the need to provide for further resources such as referral to a chaplain or support group. These approaches, however, have not been systematically investigated as empirical measures or indices of religiousness or of spiritual well-being or distress.

- The SPIRITual History.[19] SPIRIT is an acronym for the six domains explored by this tool:
  1. S, spiritual belief system.
  2. P, personal spirituality.
  3. I, integration with a spiritual community.
  4. R, ritualized practices and restrictions.
  5. I, implications for medical care.
  6. T, terminal events planning.
  The six domains cover 22 items, which may be explored in as little as 10 or 15 minutes or integrated into general interviewing over several appointments. A strength of this tool is the number of questions pertinent to managing serious illness and understanding how patient religious beliefs may affect patient care decisions.
- Faith, Importance/Influence, Community, and Address (FICA) Spiritual History.[1,20] A set of questions explores each area (e.g., What is your faith? How important is it? Are you part of a religious community? How would you like me as your provider to address these issues in your care?). Although developed as a spiritual history tool for primary care settings, it lends itself to any patient population. The relative simplicity of the approach has led to its adoption by many medical schools.

Table 1. Assessment of Religion and Spirituality in Cancer Patients

Tool | Developer | Purpose/ Focus/ Subscale (No.) | Specific to Cancer Patients? | Level of Psychometric Development | Length/ Other Characteristics/ Comments
Systems of Belief Inventory (SBI-15R) [7] | Holland et al. | Two factors: Beliefs/experience (10); religious social support (5) | Yes | High | Four items assume belief in God
DRI/DUREL [5] | Sherman et al. | Religious involvement (5) | Yes | Moderate
FACIT-Sp [10 ,15] | Brady et al.; Peterman | Two factors: Meaning & peace (8), faith (4) | Yes | High. Limited cross-validation data. | Part of FACT-G quality-of-life battery [11]
Brief RCOPE [8] | Pargament et al. | Two factors: Positive coping; negative coping/distress | No | Very High
Fetzer Multidimensional Scale [21] | Fetzer | Multiple subscales | No | High. Under development.
FICA: Spiritual history [1] | Puchalski et al. | Brief spiritual history | No | Low | MD interview assessment
SPIRIT [19] | Maugans | In-depth interview with guided questions | No | Low | MD interview assessment
Spiritual Transformation Scale (STS) [18] | Cole et al. | Two factors: Spiritual Growth and Spiritual Decline | Yes | Moderate | Forty items. Unique to assessing change in spiritual experience post–cancer diagnosis.

DRI/DUREL = Duke Religious Index; FACIT-Sp = Functional Assessment of Chronic Illness Therapy–Spiritual Well-Being; FACT-G = Functional Assessment of Cancer Therapy–General; FICA = Faith, Importance/Influence, Community, and Address Spiritual History; RCOPE = Brief Measure of Religious Coping; SPIRIT = The SPIRITual History.

### References

Puchalski C, Romer AL: Taking a spiritual history allows clinicians to understand patients more fully. J Palliat Med 3(1): 129-137, 2000.
Kristeller JL, Zumbrun CS, Schilling RF: 'I would if I could': how oncologists and oncology nurses address spiritual distress in cancer patients. Psychooncology 8 (5): 451-8, 1999 Sep-Oct.10559804 20027890
Sloan RP, Bagiella E, VandeCreek L, et al.: Should physicians prescribe religious activities? N Engl J Med 342 (25): 1913-6, 2000.10861331 20302427
Puchalski CM, Larson DB: Developing curricula in spirituality and medicine. Acad Med 73 (9): 970-4, 1998.9759099 98431263
Sherman AC, Plante TG, Simonton S, et al.: A multidimensional measure of religious involvement for cancer patients: the Duke Religious Index. Support Care Cancer 8 (2): 102-9, 2000.10739356 20201963
Koenig H, Parkerson GR, Meador KG: Religion index for psychiatric research. Am J Psychiatry 154 (6): 885-6, 1997.9167530 97310363
Holland JC, Kash KM, Passik S, et al.: A brief spiritual beliefs inventory for use in quality of life research in life-threatening illness. Psychooncology 7 (6): 460-9, 1998 Nov-Dec.9885087 99100825
Pargament KI, Smith BW, Koenig HG, et al.: Patterns of positive and negative religious coping with major life stressors. J Sci Study Relig 37 (4): 710-24, 1998.
Hills J, Paice JA, Cameron JR, et al.: Spirituality and distress in palliative care consultation. J Palliat Med 8 (4): 782-8, 2005.16128652
Brady MJ, Peterman AH, Fitchett G, et al.: A case for including spirituality in quality of life measurement in oncology. Psychooncology 8 (5): 417-28, 1999 Sep-Oct.10559801 20027887
Cella DF, Tulsky DS, Gray G, et al.: The Functional Assessment of Cancer Therapy scale: development and validation of the general measure. J Clin Oncol 11 (3): 570-9, 1993.8445433 93187693
Canada AL, Murphy PE, Fitchett G, et al.: A 3-factor model for the FACIT-Sp. Psychooncology 17 (9): 908-16, 2008.18095260
O'Mahony S, Goulet J, Kornblith A, et al.: Desire for hastened death, cancer pain and depression: report of a longitudinal observational study. J Pain Symptom Manage 29 (5): 446-57, 2005.15904747
Krupski TL, Saigal CS, Hanley J, et al.: Patterns of care for men with prostate cancer after failure of primary treatment. Cancer 107 (2): 258-65, 2006.16783816
Peterman AH, Fitchett G, Brady MJ, et al.: Measuring spiritual well-being in people with cancer: the functional assessment of chronic illness therapy--Spiritual Well-being Scale (FACIT-Sp). Ann Behav Med 24 (1): 49-58, 2002 Winter.12008794 22002453
Whitford HS, Olver IN, Peterson MJ: Spirituality as a core domain in the assessment of quality of life in oncology. Psychooncology 17 (11): 1121-8, 2008.18322902
Johnson ME, Piderman KM, Sloan JA, et al.: Measuring spiritual quality of life in patients with cancer. J Support Oncol 5 (9): 437-42, 2007.18019851
Cole BS, Hopkins CM, Tisak J, et al.: Assessing spiritual growth and spiritual decline following a diagnosis of cancer: reliability and validity of the spiritual transformation scale. Psychooncology 17 (2): 112-21, 2008.17458862
Maugans TA: The SPIRITual history. Arch Fam Med 5 (1): 11-6, 1996.8542049 96135985
Borneman T, Ferrell B, Puchalski CM: Evaluation of the FICA Tool for Spiritual Assessment. J Pain Symptom Manage 40 (2): 163-73, 2010.20619602
Multidimensional Measurement of Religiousness/Spirituality for Use in Health Research: A Report of the Fetzer Institute/National Institute on Aging Working Group. Fetzer Institute, 1999.

## Modes of Intervention

Various modes of intervention or assistance might be considered to address the spiritual concerns of patients, including the following:

- Exploration by the physician or other health care provider within the context of usual medical care.
- Encouragement for patients to seek assistance from their own clergy.
- Formal referral to a hospital chaplain.
- Referral to a religious or faith-based therapist.
- Referral to support groups known to address spiritual issues.

Two survey studies [1,2] found that physicians consistently underestimate the degree to which patients want spiritual concerns addressed. An Israeli study found that patients expressed the desire that 18% of a hypothetical 10-minute visit be spent addressing such concerns, while their providers estimated that 12% of the time should be spent in this way.[2] This study also found that while providers perceived that a patient's desire to address spiritual concerns related to a broader interest in complementary and alternative medicine (CAM) modalities, patients viewed CAM-related issues and spiritual/religious concerns as quite separate.

### Physicians

A task force [3] of physicians and end-of-life specialists suggested several guidelines for physicians who wish to respond to patients’ spiritual concerns:

- Respect the patient’s views and follow the patient’s lead.
- Make a connection by listening carefully and acknowledging the patient’s concerns, but avoid theological discussions or specific religious rituals.
- Maintain one's own integrity in relation to one's own religious beliefs and practices.
- Identify common goals for care and medical decisions.
- Mobilize other resources of support for the patient, such as referral to a chaplain or contact with the patient’s own clergy.

Inquiring about religious or spiritual concerns may provide valuable and appreciated support to patients. Most cancer patients appear to welcome a dialogue about such concerns, regardless of diagnosis or prognosis. In a large survey, 20% to 35% of outpatients with cancer expressed the following:[4][Level of evidence: II]

- A desire for religious and spiritual resources.
- Help with talking about finding meaning in life.
- Help with finding hope.
- Talking about death and dying.
- Finding peace of mind.

It is appropriate to initiate such an inquiry once initial diagnosis and treatment issues have been discussed and considered by the patient (approximately a month after diagnosis or later). In a large, multisite, longitudinal study of patients with advanced cancer,[5][Level of evidence: II] there was considerable variation in whether medical staff addressed spiritual concerns, with about 50% reporting at least some support at three of the settings, in contrast with fewer than 15% reporting some support at the other four settings.

Support from the medical team predicted the following:

- Greater quality of life.
- Greater likelihood of receiving hospice care at the end of life.
- Less-aggressive care for patients who have high levels of religious coping.

One trial,[6][Level of evidence: II] with a sample of 115 mixed-diagnosis patients (54% under active treatment), evaluated a 5-minute semistructured inquiry into spiritual and religious concerns. The four physicians’ personal religious backgrounds included two Christians, one Hindu, and one Sikh; 81% of patients were Christian. Unlike the history-oriented interviews noted above, this inquiry was informed by brief patient-centered counseling approaches that view the physician as an important source of empowerment to help patients identify and address personal concerns (see Table 2 below for the content). After 3 weeks, the intervention group had larger reductions in depression, had more improvement in quality of life, and rated their relationship with the physician more favorably. Effects for quality of life remained after statistically adjusting for change in other variables. More improvement was also seen in patients who scored lower in spiritual well-being, as measured by the Functional Assessment of Chronic Illness Therapy—Spiritual Well-Being (FACIT-Sp) at baseline. Acceptability was high, with physicians rating themselves as “comfortable” in providing the intervention during 85% of encounters. Seventy-six percent of patients characterized the inquiry as “somewhat” to “very” useful. Physicians were twice as likely to underestimate the usefulness of the inquiry to patients rather than to overestimate it, in relation to patient ratings.

The statements in Table 2 may be used to initiate a dialogue between health care provider and patient.

Table 2. Exploring Spiritual/Religious Concerns in Adults With Cancer^a^

Health Care Provider Inquiry | Question for Patient
Introduce issue in neutral inquiring manner. | “When dealing with a serious illness, many people draw on religious or spiritual beliefs to help cope. It would be helpful to me to know how you feel about this.”
Inquire further, adjusting inquiry to patient’s initial response. | Positive-Active Faith Response: “What have you found most helpful about your beliefs since your illness?”
Inquire further, adjusting inquiry to patient’s initial response. | Neutral-Receptive Response: “How might you draw on your faith or spiritual beliefs to help you?”
Inquire further, adjusting inquiry to patient’s initial response. | Spiritually Distressed Response (e.g., expression of anger or guilt): “Many people feel that way…what might help you come to terms with this?”
Inquire further, adjusting inquiry to patient’s initial response. | Defensive/Rejecting Response: “It sounds like you’re uncomfortable I brought this up. What I’m really interested in is how you are coping…can you tell me about that?”
Continue to explore further as indicated. | “I see. Can you tell me more (about…)?”
Inquire about ways of finding meaning and a sense of peace. | “Is there some way in which you are able to find a sense of meaning or peace in the midst of this?”
Inquire about resources. | "Who can you talk to about these concerns?"
Offer assistance as appropriate and available. | “Perhaps we can arrange for you to talk to someone/There’s a support group I can suggest/There are some reading materials in the waiting room.”
Bring inquiry to a close. | “I appreciate you discussing these issues with me. May I ask about it again?”

^a^Adapted from Kristeller et al.[6]

A common concern is whether to offer to pray with patients. Although one study [7] found that more than one-half of the patients surveyed expressed a desire to have physicians pray with them, a large proportion did not express this preference. A qualitative study of cancer patients [8] found that they were concerned that physicians are too busy, not interested, or even prohibited from discussing religion. At the same time, patients generally wanted their physicians to acknowledge the value of spiritual and religious issues. A suggestion was made that physicians might raise the question of prayer by asking, “Would that comfort you?”

In a study of 70 patients with advanced cancer, 206 oncology physicians, and 115 oncology nurses, all participants were interviewed about the appropriateness of patient-practitioner prayer in the advanced-cancer setting. Results showed that 71% of patients, 83% of nurses, and 65% of physicians reported that it is occasionally appropriate for a practitioner to pray with a patient when the patient initiates the request. Similarly, 64% of patients, 76% of nurses, and 59% of physicians reported that they consider it appropriate for a religious/spiritual health care practitioner to pray for a patient.[9]

The most important guideline is to remain sensitive to the patient’s preference. Asking patients about their beliefs or spiritual concerns in the context of exploring how they are coping in general is the most viable approach in exploring these issues.

### Hospital Chaplains

Traditionally, hospital chaplains deliver religious or spiritual assistance to patients.[10,11] Hospital chaplains can play a key role because they are trained to work with a wide range of issues as they arise for patients and to be sensitive to patients' diverse beliefs and concerns.[12] Chaplains are generally available in large medical centers but may not be reliably available in smaller hospitals. Chaplains are rarely available in outpatient settings where most cancer care is now delivered (especially early in the course of cancer treatment, when these issues may first arise). In a large, multisite, longitudinal study of patients with advanced cancer,[5][Level of evidence: II] only 46% of patients reported receiving pastoral care visits. While these visits were not associated with receiving end-of-life care (either hospice or aggressive measures), they were associated with better quality of life near death.

Another traditional approach in outpatient settings is having spiritual/religious resources available in waiting rooms. This activity is relatively easy to do, and many resources exist. A breadth of resources covering all faith backgrounds of patients is highly desirable. For more information, see the Additional Resources section.

### Support Groups

Support groups may provide a setting where patients may explore spiritual concerns. The health care provider may need to identify whether an in-person or online group addresses these issues. The published data on the specific effects of support groups on assisting with spiritual concerns is relatively sparse, partly because this aspect of adjustment has not been systematically evaluated. A randomized trial [13][Level of evidence: I] compared the effects of a mind-body-spirit group to a standard support group for women with breast cancer. Both groups showed improvement in spiritual well-being, although there were appreciably more differential effects for the mind-body-spirit group in the area of spiritual integration.

A study of 97 lower-income women with breast cancer who were participating in an online support group examined the relationship between a variety of psychosocial outcomes and religious expression (as indicated by the use of religious words such as faith, God, pray, holy, or spirit). Results showed that women who communicated a deeper religiousness in their online writing to others had lower levels of negative emotions, higher levels of perceived health self-efficacy, and higher functional well-being.[14] An exploratory study of a monthly spirituality-based support group program for African American women with breast cancer suggested high levels of satisfaction in a sample that already had high levels of religious and spiritual engagement.[15][Level of evidence: III]

One author [16] presents a well-developed model of adjuvant psychological therapy that uses a large group format and addresses both basic coping issues and spiritual concerns and healing, using a combination of group exploration, meditation, prayer, and other spiritually oriented exercises. In a carefully conducted, longitudinal, qualitative study of 22 patients enrolled in this type of intervention,[17] researchers found that patients who were more psychologically engaged with the issues presented were more likely to survive longer. Other approaches are available but have yet to be systematically evaluated,[18,19] have not explicitly addressed religious and spiritual issues, or have failed to evaluate the effects of the intervention on spiritual well-being.[20]

### Other Interventions

Other therapies may also support spiritual growth and post-traumatic benefit finding. For example, in a nonrandomized comparison of mindfulness-based stress reduction (n = 60) and a healing arts program (n = 44) in cancer outpatients with a variety of diagnoses, both programs significantly improved facilitation of positive growth in participants, although improvements in spirituality, stress, depression, and anger were significantly larger for the mindfulness-based stress reduction group.[21][Level of evidence: II]

### References

Kristeller JL, Zumbrun CS, Schilling RF: 'I would if I could': how oncologists and oncology nurses address spiritual distress in cancer patients. Psychooncology 8 (5): 451-8, 1999 Sep-Oct.10559804 20027890
Ben-Arye E, Bar-Sela G, Frenkel M, et al.: Is a biopsychosocial-spiritual approach relevant to cancer treatment? A study of patients and oncology staff members on issues of complementary medicine and spirituality. Support Care Cancer 14 (2): 147-52, 2006.16133071
Lo B, Ruston D, Kates LW, et al.: Discussing religious and spiritual issues at the end of life: a practical guide for physicians. JAMA 287 (6): 749-54, 2002.11851542 21841470
Astrow AB, Wexler A, Texeira K, et al.: Is failure to meet spiritual needs associated with cancer patients' perceptions of quality of care and their satisfaction with care? J Clin Oncol 25 (36): 5753-7, 2007.18089871
Balboni TA, Paulk ME, Balboni MJ, et al.: Provision of spiritual care to patients with advanced cancer: associations with medical care and quality of life near death. J Clin Oncol 28 (3): 445-52, 2010.20008625
Kristeller JL, Rhodes M, Cripe LD, et al.: Oncologist Assisted Spiritual Intervention Study (OASIS): patient acceptability and initial evidence of effects. Int J Psychiatry Med 35 (4): 329-47, 2005.16673834
King DE, Bushwick B: Beliefs and attitudes of hospital inpatients about faith healing and prayer. J Fam Pract 39 (4): 349-52, 1994.7931113 95016475
Hebert RS, Jenckes MW, Ford DE, et al.: Patient perspectives on spirituality and the patient-physician relationship. J Gen Intern Med 16 (10): 685-92, 2001.11679036 21536968
Balboni MJ, Babar A, Dillinger J, et al.: "It depends": viewpoints of patients, physicians, and nurses on patient-practitioner prayer in the setting of advanced cancer. J Pain Symptom Manage 41 (5): 836-47, 2011.21276700
Fitchett G, Meyer PM, Burton LA: Spiritual care in the hospital: who requests it? Who needs it? J Pastoral Care 54 (2): 173-86, 2000 Summer.11067526 20447969
Handzo G: Where do chaplains fit in the world of cancer care? J Health Care Chaplain 4 (1-2): 29-44, 1992.10124193 93180056
Association of Professional Chaplains, Association for Clinical Pastoral Education, Canadian Association for Pastoral Practice and Education, et al.: A White Paper. Professional chaplaincy: its role and importance in healthcare. J Pastoral Care 55 (1): 81-97, 2001 Spring.11303456 21199197
Targ EF, Levine EG: The efficacy of a mind-body-spirit group for women with breast cancer: a randomized controlled trial. Gen Hosp Psychiatry 24 (4): 238-48, 2002 Jul-Aug.12100834 22095312
Shaw B, Han JY, Kim E, et al.: Effects of prayer and religious expression within computer support groups on women with breast cancer. Psychooncology 16 (7): 676-87, 2007.17131348
Antle B, Collins WL: The impact of a spirituality-based support group on self-efficacy and well-being of African American breast cancer survivors: a mixed methods design. Social Work and Christianity 36 (3): 286-300, 2009.
Cunningham AJ: Group psychological therapy: an integral part of care for cancer patients. Integrative Cancer Therapies 1(1): 67-75, 2002.
Cunningham AJ, Edmonds CV, Phillips C, et al.: A prospective, longitudinal study of the relationship of psychological work to duration of survival in patients with metastatic cancer. Psychooncology 9 (4): 323-39, 2000 Jul-Aug.10960930 20418290
Breitbart W: Spirituality and meaning in supportive care: spirituality- and meaning-centered group psychotherapy interventions in advanced cancer. Support Care Cancer 10 (4): 272-80, 2002.12029426 22025737
Cole B, Pargament K: Re-creating your life: a spiritual/psychotherapeutic intervention for people diagnosed with cancer. Psychooncology 8 (5): 395-407, 1999 Sep-Oct.10559799 20027885
Spiegel D, Bloom JR, Kraemer H, et al.: Psychological support for cancer patients. Lancet 2 (8677): 1447, 1989.2574371 90081157
Garland SN, Carlson LE, Cook S, et al.: A non-randomized comparison of mindfulness-based stress reduction and healing arts programs for facilitating post-traumatic growth and spirituality in cancer outpatients. Support Care Cancer 15 (8): 949-61, 2007.17611782

## Increasing Personal Awareness in Health Care Providers

Many health care providers may regard spirituality, religion, death, and dying as a taboo subject. The meaning of illness and the possibility of death are often difficult to address. The assessment resources noted above may help introduce the topic of spiritual concerns, death, and dying to a patient in a supportive manner. In addition, reading clinical accounts by other health care providers can be helpful. For example, a qualitative study using an autoethnographic approach to explore spirituality in members of an interdisciplinary palliative care team. Findings from this work yielded a collective spirituality that emerged from the common goals, values, and belonging shared by team members. Participants' reflections offer insights into patient care for other health care professionals.[1]

### References

Sinclair S, Raffin S, Pereira J, et al.: Collective soul: the spirituality of an interdisciplinary palliative care team. Palliat Support Care 4 (1): 13-24, 2006.16889320

## Issues to Consider

Although a considerable number of anecdotal accounts suggest that prayer, meditation, imagery, or other religious activity can have healing power, the empirical evidence is extremely limited and inconsistent.[1] On the basis of current evidence, it is questionable whether any patient with cancer should be encouraged to seek such resources as a means to heal or to limit the physical effects of disease. However, the psychological value of support and spiritual well-being is increasingly well documented, and evidence that spiritual distress can have a negative impact on health is growing. Health care providers need to frame these resources in terms of self-understanding, clarifying questions of belief with an appropriate spiritual or religious leader, or seeking a sense of inner peace or awareness.

### References

Sloan RP, Bagiella E: Claims about religious involvement and health outcomes. Ann Behav Med 24 (1): 14-21, 2002 Winter.12008790 22002450

## Additional Resources

- University of Florida Center for Spirituality and Health. (https://spiritualityandhealth.ufl.edu/) Conducts courses, research projects, and programs that focus on the interface between religious traditions, spirituality, and health.
- George Washington Institute for Spirituality and Health. (https://gwish.smhs.gwu.edu/) Focuses on medical education in the area of religion, spirituality, and medicine.
- Benson-Henry Institute for Mind Body Medicine (https://bensonhenryinstitute.org/) at Massachusetts General Hospital. Provides outpatient medical services, training for health professionals, corporate and school-based programs, women's health services, and affiliation for national and international health care systems.
- Duke University Center for Spirituality, Theology, and Health. (https://spiritualityandhealth.duke.edu/) Conducts interdisciplinary research, scholarship, and education on spirituality, theology, and health.

These reference citations are included for informational purposes only. Their inclusion should not be viewed as an endorsement by the PDQ Supportive and Palliative Care Editorial Board or the National Cancer Institute.

## Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Latest Updates to This Summary (12/12/2023)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about religious and spiritual coping in cancer care. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewer for Spirituality in Cancer Care is:

- Amy Wachholtz, PhD, MDiv, MS, ABPP (University of Colorado)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Supportive and Palliative Care Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Spirituality in Cancer Care. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/coping/day-to-day/faith-and-spirituality/spirituality-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389436]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).